# Cancell/Cantron/Protocel (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the use of Cancell/Cantron/Protocel in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board.

## Overview

NOTE: There is either no new research on this topic or the recent published research is weak and not appropriate for inclusion in the summary. Therefore, the information in this summary is no longer being updated and is provided for reference purposes only.

- Cancell is a trademarked name of a liquid mixture long promoted as a treatment for people with cancer and other diseases (see Question 1).
- The U.S. Food and Drug Administration (FDA) has listed the ingredients of Cancell as the chemicals inositol, nitric acid, sodium sulfite, potassium hydroxide, sulfuric acid, and catechol (see Question 3).
- Cantron and Protocel are other products that are said to be similar to Cancell.
- None of the common chemicals in these products is known to be effective in treating any type of cancer.
- In the early 1990s, the National Cancer Institute (NCI) tested these ingredients against cancer cells in the laboratory and based on the results decided not to continue studying Cancell (see Question 5).
- No clinical trials have been published in peer-reviewed journals. Only testimonials and anecdotal reports have been made available. (See Question 6.)
- The U.S. Food and Drug Administration has not approved Cancell to treat cancer or any disease in the United States. In 1989, the FDA requested and received a court order making it illegal for manufacturers to send Cancell across state lines. (See Question 8.)

## Questions and Answers About Cancell

1. What is Cancell?
  Cancell is also called Sheridan’s Formula, Jim’s Juice, JS–114, JS–101, 126–F, and "Cancell-like" products (Cantron and Protocel). It is a liquid that was promoted as a treatment for cancer and other diseases. Cancell was made using different mixtures of ingredients, mainly by two companies, since the late 1930s.
  None of the common chemicals in these products is known to be effective in treating any type of cancer.
  Since 1989, it has been illegal in the United States to make, sell, or give Cancell as a treatment for any disease. Mixtures similar to Cancell, such as Cantron and Protocel, are available as dietary supplements. (See Question 8.)
2. What is the history of the discovery and use of Cancell as a complementary or alternative treatment for cancer?
  Cancell was first made in the late 1930s by James V. Sheridan, a biochemist who called the mixture Entelev and gave it free to cancer patients. In 1984, another company began making Entelev under the name Cancell. That company gave it free to patients with cancer, AIDS (acquired immunodeficiency syndrome), and other conditions.
3. What is the theory behind the claim that Cancell is useful in treating cancer?
  The exact ingredients used to make Cancell are not known. One sample of the liquid mixture Cancell was found to contain 12 different ingredients, none of which is known to be helpful in treating any type of cancer. The U.S. Food and Drug Administration (FDA) has listed the following ingredients in Cancell:
  - Inositol.
  - Nitric acid.
  - Sodium sulfite.
  - Potassium hydroxide.
  - Sulfuric acid.
  - Catechol.
  The first maker of Cancell said the ingredients work together by changing cancer cells so they are seen by the body as "foreign" and are destroyed. The second maker stated that Cancell changes cancer cells so they “self-digest” and are replaced by normal cells. The waste matter made by this self-digestion was said to be passed from the body in urine, sweat, and other body fluids.
4. How is Cancell administered?
  Cancell has been taken by mouth, inserted into the rectum, or applied to the skin of the wrist or the ball of the foot. Patients taking Cancell were advised by the makers to take bromelain to help digestion and to avoid high doses of vitamin C and vitamin E. Makers of Cancell stated that vitamins raise the energy of the cell while Cancell lowers it.
5. Have any preclinical (laboratory or animal) studies been conducted using Cancell?
  Research in a laboratory or using animals is done to find out if a drug, procedure, or treatment is likely to be useful in humans. These preclinical studies are done before any testing in humans is begun. Some research studies are published in scientific journals. Most scientific journals have experts who review research reports before they are published, to make sure that the evidence and conclusions are sound. This is called peer review. Studies published in peer-reviewed scientific journals are considered to be better evidence.
  The National Cancer Institute (NCI) did animal studies on Cancell in 1978 and 1980 and laboratory studies in 1990 and 1991. Laboratory studies using human tumor cells concluded that Cancell could not be taken in doses high enough to kill cancer cells in the body. The NCI decided that Cancell did not show enough anticancer activity to continue the studies. See the PDQ health professional summary on Cancell/Cantron/Protocel for details on the results of these studies.
  The makers of Cancell reported doing animal studies with the liquid mixtures, but none of these studies have been published in peer-reviewed scientific journals. No information has been given on these studies, beyond stating that some of the studies tested the toxicity (harmful and unwanted side effects) of Cancell.
6. Have any clinical trials (research studies with people) been conducted using Cancell?
  No clinical trials of Cancell have been reported. The makers of Cancell have stated that more than 15,000 patients have used the mixture and that it is safe and effective in treating 50% to 80% of all cancers. Their findings have not been published in peer-reviewed scientific journals. Testimonials (information given by people who state that they have been helped by a particular treatment or product) and anecdotal reports (incomplete descriptions of the medical and treatment histories of one or more patients) have been made available by the manufacturers.
7. Have any side effects or risks been reported from Cancell?
  The company that made Cancell stated that the side effects of the mixture include feeling tired during the first few weeks of treatment. Nausea is also a reported side effect. One patient who took more than the maker's advised dose reported diarrhea that lasted for a few hours.
8. Is Cancell approved by the U.S. Food and Drug Administration (FDA) for use as a cancer treatment in the United States?
  Cancell is not approved for use in the United States. In 1989, the U.S. Food and Drug Administration judged Cancell to be a new, unapproved drug. The FDA requested and received a court order making it illegal for manufacturers to send Cancell across state lines. The mixture may no longer be made, sold, or given to patients as a treatment for cancer or other diseases.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the use of Cancell/Cantron/Protocel in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Cancell/Cantron/Protocel. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/patient/cancell-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389431]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).

## General CAM Information

Complementary and alternative medicine (CAM)—also called integrative medicine—includes a broad range of healing philosophies, approaches, and therapies. A therapy is generally called complementary when it is used in addition to conventional treatments; it is often called alternative when it is used instead of conventional treatment. (Conventional treatments are those that are widely accepted and practiced by the mainstream medical community.) Depending on how they are used, some therapies can be considered either complementary or alternative. Complementary and alternative therapies are used in an effort to prevent illness, reduce stress, prevent or reduce side effects and symptoms, or control or cure disease.

Unlike conventional treatments for cancer, complementary and alternative therapies are often not covered by insurance companies. Patients should check with their insurance provider to find out about coverage for complementary and alternative therapies.

Cancer patients considering complementary and alternative therapies should discuss this decision with their doctor, nurse, or pharmacist as they would any type of treatment. Some complementary and alternative therapies may affect their standard treatment or may be harmful when used with conventional treatment.

## Evaluation of CAM Therapies

It is important that the same scientific methods used to test conventional therapies are used to test CAM therapies. The National Cancer Institute and the National Center for Complementary and Integrative Health (NCCIH) are sponsoring a number of clinical trials (research studies) at medical centers to test CAM therapies for use in cancer.

Conventional approaches to cancer treatment have generally been studied for safety and effectiveness through a scientific process that includes clinical trials with large numbers of patients. Less is known about the safety and effectiveness of complementary and alternative methods. Few CAM therapies have been tested using demanding scientific methods. A small number of CAM therapies that were thought to be purely alternative approaches are now being used in cancer treatment—not as cures, but as complementary therapies that may help patients feel better and recover faster. One example is acupuncture. According to a panel of experts at a National Institutes of Health (NIH) meeting in November 1997, acupuncture has been found to help control nausea and vomiting caused by chemotherapy and pain related to surgery. However, some approaches, such as the use of laetrile, have been studied and found not to work and to possibly cause harm.

The NCI Best Case Series Program (https://cam.cancer.gov/indentifying_novel_cam_therapies/best_case_series_program.htm) which was started in 1991, is one way CAM approaches that are being used in practice are being studied. The program is overseen by the NCI’s Office of Cancer Complementary and Alternative Medicine (OCCAM). Health care professionals who offer alternative cancer therapies submit their patients’ medical records and related materials to OCCAM. OCCAM carefully reviews these materials to see if any seem worth further research.

## Questions to Ask Your Health Care Provider About CAM

When considering complementary and alternative therapies, patients should ask their health care provider the following questions:

- What side effects can be expected?
- What are the risks related to this therapy?
- What benefits can be expected from this therapy?
- Do the known benefits outweigh the risks?
- Will the therapy affect conventional treatment?
- Is this therapy part of a clinical trial?
- If so, who is the sponsor of the trial?
- Will the therapy be covered by health insurance?

## To Learn More About CAM

National Center for Complementary and Integrative Health (NCCIH)

The National Center for Complementary and Integrative Health (NCCIH) at the National Institutes of Health (NIH) facilitates research and evaluation of complementary and alternative practices, and provides information about a variety of approaches to health professionals and the public.

- NCCIH Clearinghouse
- Post Office Box 7923 Gaithersburg, MD 20898–7923
- Telephone: 1-888-644-6226 (toll free)
- TTY (for deaf and hard of hearing callers): 1-866-464-3615
- E-mail: info@nccih.nih.gov
- Website: https://nccih.nih.gov

CAM on PubMed

NCCIH and the NIH National Library of Medicine (NLM) jointly developed CAM on PubMed (https://nccih.nih.gov/research/camonpubmed), a free and easy-to-use search tool for finding CAM-related journal citations. As a subset of the NLM's PubMed bibliographic database, CAM on PubMed features more than 230,000 references and abstracts for CAM-related articles from scientific journals. This database also provides links to the websites of over 1,800 journals, allowing users to view full-text articles. (A subscription or other fee may be required to access full-text articles.)

Office of Cancer Complementary and Alternative Medicine

The NCI Office of Cancer Complementary and Alternative Medicine (OCCAM) coordinates the activities of the NCI in the area of complementary and alternative medicine (CAM). OCCAM supports CAM cancer research and provides information about cancer-related CAM to health providers and the general public via the NCI website (https://www.cancer.gov/).

National Cancer Institute (NCI) Cancer Information Service

U.S. residents may call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, toll free at 1-800-4-CANCER (1-800-422-6237) Monday through Friday from 9:00 am to 9:00 pm. A trained Cancer Information Specialist is available to answer your questions.

Food and Drug Administration

The Food and Drug Administration (FDA) regulates drugs and medical devices to ensure that they are safe and effective.

- Food and Drug Administration
- 10903 New Hampshire Avenue
- Silver Spring, MD 20993
- Telephone: 1-888-463-6332 (toll free)
- Website: http://www.fda.gov

Federal Trade Commission

The Federal Trade Commission (FTC) enforces consumer protection laws. Publications available from the FTC include:

- Who Cares: Sources of Information About Health Care Products and Services
- Fraudulent Health Claims: Don’t Be Fooled

- Consumer Response Center
- Federal Trade Commission
- 600 Pennsylvania Avenue, NW
- Washington, DC 20580
- Telephone: 1-877-FTC-HELP (1-877-382-4357) (toll free)
- TTY (for deaf and hard of hearing callers): 202-326-2502
- Website: http://www.ftc.gov